# Communication in Cancer Care (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about communicating with the cancer patient and his or her family. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This summary provides oncology clinicians with an overview of key topics in communication in cancer care. The goal is to facilitate more effective communication between cancer clinicians and the patients and families they care for. The summary explores the following topics:

- Discussion of the literature on the goals and importance of high-quality communication.
- Overview of common communication models.
- Demographic and cultural influences on communication.
- Evidence on education and training in cancer communication for clinicians.
- Communication challenges in oncology and methods used to approach them.
- Considerations for communication in pediatric oncology.

The literature on communication in cancer care is actively evolving and, to date, much of it has been descriptive, observational, and/or qualitative. When possible, controlled/randomized data have been included. Communication research is also particularly vulnerable to bias and other confounders, an issue discussed further below.

Communication involves an exchange of information and a means of connection between two people or parties. The relationship between the clinician and the patient embodies both aspects of communication. Patients with cancer desire information about their disease to make choices about cancer treatment and, ultimately, to live their lives more fully. In addition, most patients look to their oncologist and other cancer clinicians for guidance and support. Frequently, the information that oncologists share with patients is serious in nature and may evoke strong emotions from patients and caregivers. Effective communication requires oncologists to convey information in a manner that patients can understand, manage emotional responses to the information provided, and help patients make sound medical decisions.

Patient-clinician communication is defined by its bidirectional nature, with each participant giving and receiving information. Patients and their families are often greatly invested in their personal relationship with their oncologist, and the intensity and longitudinal nature of these relationships is likewise an aspect that attracts many clinicians to the field of oncology.

## Goals and Importance of Communication

Effective communication may impact health outcomes, though it remains challenging to demonstrate direct causal relationships between communication techniques and outcomes and/or identify the precise elements of patient-provider communication in oncology that result in improved physical, emotional, and other health care outcomes. Although the body of oncology-specific communication research is growing, level I evidence supporting specific tools or interventions from randomized controlled trials remains limited. Notably, studies on communication may have several confounders, including recall bias, self-reporting bias, and multiple influences on understanding. Communication research also suffers from a lack of standardized and validated communication assessment measures, while rigid and/or specific approaches to communication may fail to adapt to social and cultural differences in communication.

Despite these challenges in the literature, investigators have proposed links between good patient-centered communication skills—focused on defining and attending to the specific information needs of the patient, fostering trusting relationships, and addressing both cognitive and emotional needs in communication—with the following patient- and system-related outcomes:[1]

- Enhanced patient satisfaction.[2]
- Increased quality of life.[3,4]
- Reduced patient anxiety and improved symptom control.[4-7]
- Adherence with treatment recommendations.[8]
- Enhanced accrual to clinical trials.[9]
- Improved disease-related understanding.[10]
- Improved prognostic awareness.[11,12]
- Receipt of care consistent with the patient's stated preferences, particularly at the end of life.[12,13]
- Decreased oncologist stress and burnout.[14]

Conversely, there is also evidence to suggest that patient dissatisfaction with poor communication may lead to negative outcomes, such as increased malpractice suits. A small number of physicians appears to generate a disproportionate number of lawsuits.[15,16] Although there are a number of risk factors for malpractice claims—including physician specialty, number of patients seen, and physician characteristics—they do not seem to be predicted by the characteristics of a physician’s patients, the technical aspects of care, or the complexity of care.[17] Rather, patient dissatisfaction—especially with interpersonal aspects of care such as the physician's friendliness and courteousness, ability to convey information to the patient, and concern for patient worries—seems to be an important determining factor.[18]

In the best-case scenario, a communication event results in knowledge creation for both parties, allowing clinicians to help guide and support patients in making decisions aligned with their goals and values, and empowering patients to participate more actively in their health care.

### References

Ong LM, Visser MR, Lammes FB, et al.: Doctor-patient communication and cancer patients' quality of life and satisfaction. Patient Educ Couns 41 (2): 145-56, 2000.12024540
Zachariae R, Pedersen CG, Jensen AB, et al.: Association of perceived physician communication style with patient satisfaction, distress, cancer-related self-efficacy, and perceived control over the disease. Br J Cancer 88 (5): 658-65, 2003.12618870
Lorusso D, Bria E, Costantini A, et al.: Patients' perception of chemotherapy side effects: Expectations, doctor-patient communication and impact on quality of life - An Italian survey. Eur J Cancer Care (Engl) 26 (2): , 2017.28004440
Pozzar RA, Xiong N, Hong F, et al.: Perceived patient-centered communication, quality of life, and symptom burden in individuals with ovarian cancer. Gynecol Oncol 163 (2): 408-418, 2021.34454724
Mack JW, Fasciano KM, Block SD: Communication About Prognosis With Adolescent and Young Adult Patients With Cancer: Information Needs, Prognostic Awareness, and Outcomes of Disclosure. J Clin Oncol 36 (18): 1861-1867, 2018.29683788
Shin JA, El-Jawahri A, Parkes A, et al.: Quality of Life, Mood, and Prognostic Understanding in Patients with Metastatic Breast Cancer. J Palliat Med 19 (8): 863-9, 2016.27124211
Lin JJ, Chao J, Bickell NA, et al.: Patient-provider communication and hormonal therapy side effects in breast cancer survivors. Women Health 57 (8): 976-989, 2017.27618729
Jacobs JM, Pensak NA, Sporn NJ, et al.: Treatment Satisfaction and Adherence to Oral Chemotherapy in Patients With Cancer. J Oncol Pract 13 (5): e474-e485, 2017.28398843
Albrecht TL, Eggly SS, Gleason ME, et al.: Influence of clinical communication on patients' decision making on participation in clinical trials. J Clin Oncol 26 (16): 2666-73, 2008.18509178
Weeks JC, Catalano PJ, Cronin A, et al.: Patients' expectations about effects of chemotherapy for advanced cancer. N Engl J Med 367 (17): 1616-25, 2012.23094723
Lobb EA, Halkett GK, Nowak AK: Patient and caregiver perceptions of communication of prognosis in high grade glioma. J Neurooncol 104 (1): 315-22, 2011.21153859
Liu PH, Landrum MB, Weeks JC, et al.: Physicians' propensity to discuss prognosis is associated with patients' awareness of prognosis for metastatic cancers. J Palliat Med 17 (6): 673-82, 2014.24742212
Tang ST, Wen FH, Hsieh CH, et al.: Preferences for Life-Sustaining Treatments and Associations With Accurate Prognostic Awareness and Depressive Symptoms in Terminally Ill Cancer Patients' Last Year of Life. J Pain Symptom Manage 51 (1): 41-51.e1, 2016.26386187
Graham J, Ramirez A: Improving the working lives of cancer clinicians. Eur J Cancer Care (Engl) 11 (3): 188-92, 2002.12296836
May ML, Stengel DB: Who sues their doctors? How patients handle medical grievances. Law Soc Rev 24 (1): 105-20, 1990.
Brueck M, Salib AM: Strategies for Acing the Fundamentals and Mitigating Legal and Ethical Consequences of Poor Physician-Patient Communication. AMA J Ethics 19 (3): 289-295, 2017.28323610
Stelfox HT, Gandhi TK, Orav EJ, et al.: The relation of patient satisfaction with complaints against physicians and malpractice lawsuits. Am J Med 118 (10): 1126-33, 2005.16194644
Hickson GB, Federspiel CF, Pichert JW, et al.: Patient complaints and malpractice risk. JAMA 287 (22): 2951-7, 2002.12052124

## Models of Communication

Few would dispute that patient-oncologist communication has both desirable and undesirable consequences. The topics and verbal or nonverbal communication behaviors that reliably lead to desirable consequences—or away from undesirable consequences—remain largely a matter of speculation, despite a proliferation of communication skills training interventions and a growing number of empirical studies. The question, however, is of great importance to the interested oncology clinician. The consensus is that the current status of patient–oncology clinician communication is suboptimal and often leads to undesirable consequences for the patient.

For example, an often-cited, large, cross-sectional study of patients with advanced-stage cancer demonstrated that only 38% recalled discussing their end of life (EOL) preferences with a clinician. Those who did were less likely to receive intensive medical treatments (intubation, resuscitation, and intensive care unit admissions) and more likely to enroll in hospice. Furthermore, more aggressive medical treatment was associated with lower quality of life.[1] Many other observational studies confirm the low rate of conversations about EOL and the negative consequences of not having these conversations. Left unanswered is the question of what clinicians can do differently to improve health care behaviors and outcomes. For more information, see Planning the Transition to End-of-Life Care in Advanced Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/planning/end-of-life-hp-pdq).

Oncology clinicians acknowledge that they feel unprepared for communication with patients, especially those who may be near the EOL. They identify as additional impediments inadequate time during the average clinic visit for these difficult conversations and the emotional challenges inherent in these conversations. Communication skills training can increase clinicians’ confidence, improve certain communication behaviors, and lead to better patient satisfaction.[2] However, these and other interventions do not consistently improve other measures of communication or actual health care choices and consequences.

One explanation for the limited impact of communication interventions on patient outcomes is that models of patient-oncologist communication may not accurately reflect what happens before, during, and after encounters between patients and oncology clinicians. There are several reasons this may be the case:

- First, models reflect an ideal. In some cases, the ideal is based on ethical principles derived from research oversight rather than clinical medicine.[3] Informed consent is one example of a model based on what should happen rather than what may actually be happening.
- Second, models represent the potential relationships between variables of interest. A model may reasonably describe what happens with the measured variables but not accurately capture what happens during communication and the mechanisms that link it to outcomes.[4]
- Third, definitions and measures of communication quality are not standardized.[5,6] Measures of patient, caregiver, and clinician perceptions of communication assess participants’ subjective experiences and likely capture constructs that are distinct from the content of the communication encounter. Objective assessment of communication content and behavior requires investigators to manually code audio or video tapes of patient-clinician communication encounters, a process that may be perceived as intrusive by research participants and resource-intensive by investigators.

Many but not all studies, for example, suggest that patient expectations or prognostic understanding influence treatment decisions.[7,8] The different definitions and measures of prognostic expectations, however, may mean that related but unidentified factors are important.[9] Finally, often the data are derived from cross-sectional studies. Causal inferences are common but may not be accurate absent confirmation in a well-designed prospective trial.

That said, models are potentially useful heuristics, problem-solving techniques that use self-education to improve performance. They provide oncology clinicians with a broad sense of the goals of communication and required skills. Familiarity with the more common models also gives oncology clinicians a framework to evaluate new data and modify their approach to communication. This section describes and evaluates briefly the two dominant models of communication: shared decision making and patient-centered communication. Each model has advantages and provides a potential road map to better communication. No data allow clinicians to favor one model over another.

It is worthwhile to mention two less commonly discussed but potentially important models. The first is Cognitive-Emotional Decision Making (CEDM). One review proposed CEDM based on the potential interaction between emotions and cognition during decision making.[10] The authors’ model synthesized three well-established concepts. First, emotions inform patients’ decisions. The idea that decision making is a cognitive exercise in which the patient compares the relative risks and benefits of options is incomplete. Patients often use emotional cues—what they are feeling—to evaluate the relative importance of the risks and benefits. Second, people cope with health threats by evaluating the salience of the threat and the resources available to meet the threat. Third, people develop internal representations of the meaning of illness, and their representations influence how they evaluate and adhere to recommendations. There has not yet been empirical testing of the CEDM model. However, the model warrants mention since it recognizes emotion and coping as intrinsically relevant to the decision-making process.

The second type of model focuses on explaining the causes of behavior change. Social Cognitive Theory and the Theory of Planned Behavior are two examples.[11,12] Their relevance comes from the idea that if improvements in communication are to lead to improvements in health care outcomes, then we must understand how communication changes behaviors. For example, how do conversations lead a patient to forgo cardiopulmonary resuscitation and enroll in hospice? The models recognize that people seek positive outcomes while they try to avoid negative outcomes. Communication is one influence on the patient’s deliberations around strategies and efforts to prepare for change and then act accordingly. The models further posit that there are several modifiable mediators, e.g., knowledge, beliefs, perceived communication competence, and skills, to effect behavior change.

### Shared Decision Making

Shared decision making (SDM) was an ideal initially proposed to engage the patient in health care decisions. Prior to that, physicians tended to act as if they alone had the information necessary to formulate a diagnostic and treatment plan independent of the patient but in the patient’s best medical interest. In contrast, SDM models rest on the premise that both patients and clinicians make essential contributions to the decision-making process. Neither knows enough to make a sound decision independent of the other. Clinicians are experts in diseases and treatments. Patients are experts in their values and the trade-offs they are willing to accept. Clinicians may describe options for treatment or care and the anticipated benefits or harms, including their likelihood. However, only the patient can determine the importance of the benefits and harms since such judgments require some sense of the patient’s values and goals.

Widespread integration of SDM into patient-oncologist communication has lagged for several reasons. First, there is no consensus about what verbal and nonverbal communication behaviors are essential to SDM. Systematic reviews of the relevant literature published in 2006 and 2019 concluded that there is no unified model of SDM.[13,14] The 2019 publication identified 53 different elements mentioned in at least one of the 40 articles analyzed. The most common elements included: make the decision, elicit and integrate patient preferences, tailor information, and deliberate about options and their benefits and harms with the patient.

A second reason relates to patients’ general satisfaction with communication, regardless of whether there is evidence of SDM. For example, investigators followed 14 patients with advanced cancer with in-depth interviews and observations of outpatient clinic visits.[15] They found little evidence of SDM; however, patients rated communication encounters favorably.

A third reason relates to uncertainty about the best way to train clinicians in SDM behaviors and support implementation. The training question will likely remain relevant absent a consensus about the key attitudes and skills necessary to introduce SDM into clinical encounters. Many tools to support SDM, such as decision aids, have been tested and generally show improvement in measures of patient satisfaction and reduction in decisional conflict. These effects are modest, and improvements in patterns and consequences of health care choices are rarely seen.[16] In addition, decision aids and other tools are not widely used.[17]

At present, SDM is essentially a laudable goal of communication in search of a method. Few would disagree that patients should be fully informed of the options and their potential harms and benefits to the extent that they desire. Once informed, patients then should have an opportunity to integrate their values and goals into their choices.[18] Clinicians can play a valuable role in SDM by helping patients recognize the implications of each option for the patient’s values and goals.[19]

### Patient-Centered Communication

The National Cancer Institute commissioned communication scholars Ronald Epstein and Richard Street to evaluate the status of patient-centered communication in cancer care as part of its strategic plan to integrate social, psychological, and communication research with biomedical research. The resulting monograph presents an aspirational and comprehensive model of what patient-centered communication might accomplish. This model proposes six core functions of communication: foster healing relationships, exchange information, respond to emotion, manage uncertainty, make decisions, and enable patient self-management.[20]

The most direct evaluation of the impact of patient-centered communication on patient outcomes is the Values and Options in Cancer Care (VOICE) trial.[21] The design of the intervention and the outcome measures were based on Street’s Ecological Model of Patient-Centered Communication and four key communication goals (engaging patients and caregivers, responding to patient concerns, informing patients about treatment choices, and framing prognosis). The model suggests that interventions should target the mutual interactions between patients and oncologists rather than focusing on individual communication behaviors. In addition, the intervention should be sensitive to the social and clinical contexts relevant to the success of the intervention.

The VOICE trial was a cluster randomized clinical trial conducted at multiple clinics. A total of 118 patients were enrolled in the prerandomization period and 265 patients after physician randomization to either the intervention (n = 130) or control (n = 135) groups. The primary outcome was a composite measure based on an analysis of audio recordings of clinical encounters. The composite measure scored behaviors related to patient engagement and evidence of clinicians responding to emotion, informing patients about prognosis and treatment choice, and providing balanced information. The secondary outcomes included proximal measures of communication outcomes, e.g., the human connection scale, and distal outcomes such as aggressive treatment or hospice enrollment. The intervention improved communication behaviors, as assessed by the composite measure, without changing secondary outcomes.

### Conclusions

Models of communication articulate laudable goals and provide a high-level road map for communication in cancer care. Patients, caregivers, clinicians, and researchers seem to share a common understanding of the goals.[22] The missing details, however, hamper the development of curricula and effective interventions. In the meantime, clinicians may choose to organize or explain their communication strategies using models and modify as new evidence clarifies the communication behaviors that are most impactful.

### References

Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Moore PM, Rivera S, Bravo-Soto GA, et al.: Communication skills training for healthcare professionals working with people who have cancer. Cochrane Database Syst Rev 7: CD003751, 2018.30039853
Agledahl KM, Førde R, Wifstad A: Choice is not the issue. The misrepresentation of healthcare in bioethical discourse. J Med Ethics 37 (4): 212-5, 2011.21131609
Street RL: How clinician-patient communication contributes to health improvement: modeling pathways from talk to outcome. Patient Educ Couns 92 (3): 286-91, 2013.23746769
Epstein RM, Franks P, Fiscella K, et al.: Measuring patient-centered communication in patient-physician consultations: theoretical and practical issues. Soc Sci Med 61 (7): 1516-28, 2005.16005784
Street RL: The many "Disguises" of patient-centered communication: Problems of conceptualization and measurement. Patient Educ Couns 100 (11): 2131-2134, 2017.28619273
Zafar SY, Malin JL, Grambow SC, et al.: Chemotherapy use and patient treatment preferences in advanced colorectal cancer: a prospective cohort study. Cancer 119 (4): 854-62, 2013.22972673
Mack JW, Walling A, Dy S, et al.: Patient beliefs that chemotherapy may be curative and care received at the end of life among patients with metastatic lung and colorectal cancer. Cancer 121 (11): 1891-7, 2015.25677655
Cripe LD, Rand KL, Perkins SM, et al.: Ambulatory Advanced Cancer Patients' and Oncologists' Estimates of Life Expectancy Are Associated with Patient Psychological Characteristics But Not Chemotherapy Use. J Palliat Med 21 (8): 1107-1113, 2018.29905496
Power TE, Swartzman LC, Robinson JW: Cognitive-emotional decision making (CEDM): a framework of patient medical decision making. Patient Educ Couns 83 (2): 163-9, 2011.20573468
Prochaska JO, Velicer WF: The transtheoretical model of health behavior change. Am J Health Promot 12 (1): 38-48, 1997 Sep-Oct.10170434
Bandura A: Self-efficacy: toward a unifying theory of behavioral change. Psychol Rev 84 (2): 191-215, 1977.847061
Makoul G, Clayman ML: An integrative model of shared decision making in medical encounters. Patient Educ Couns 60 (3): 301-12, 2006.16051459
Bomhof-Roordink H, Gärtner FR, Stiggelbout AM, et al.: Key components of shared decision making models: a systematic review. BMJ Open 9 (12): e031763, 2019.31852700
Brom L, De Snoo-Trimp JC, Onwuteaka-Philipsen BD, et al.: Challenges in shared decision making in advanced cancer care: a qualitative longitudinal observational and interview study. Health Expect 20 (1): 69-84, 2017.26669902
O'Connor AM, Stacey D, Rovner D, et al.: Decision aids for people facing health treatment or screening decisions. Cochrane Database Syst Rev (3): CD001431, 2001.11686990
Légaré F, Adekpedjou R, Stacey D, et al.: Interventions for increasing the use of shared decision making by healthcare professionals. Cochrane Database Syst Rev 7: CD006732, 2018.30025154
Katz SJ, Belkora J, Elwyn G: Shared decision making for treatment of cancer: challenges and opportunities. J Oncol Pract 10 (3): 206-8, 2014.24839284
Witteman HO, Julien AS, Ndjaboue R, et al.: What Helps People Make Values-Congruent Medical Decisions? Eleven Strategies Tested across 6 Studies. Med Decis Making 40 (3): 266-278, 2020.32428426
Street RL, Makoul G, Arora NK, et al.: How does communication heal? Pathways linking clinician-patient communication to health outcomes. Patient Educ Couns 74 (3): 295-301, 2009.19150199
Epstein RM, Duberstein PR, Fenton JJ, et al.: Effect of a Patient-Centered Communication Intervention on Oncologist-Patient Communication, Quality of Life, and Health Care Utilization in Advanced Cancer: The VOICE Randomized Clinical Trial. JAMA Oncol 3 (1): 92-100, 2017.27612178
Bomhof-Roordink H, Fischer MJ, van Duijn-Bakker N, et al.: Shared decision making in oncology: A model based on patients', health care professionals', and researchers' views. Psychooncology 28 (1): 139-146, 2019.30346076

## Informational Versus Emotional Aspects of Communication

One major aspect of communication is informational. Patients come to cancer clinicians because they are experts who can provide information about their illness. However, the role of the cancer clinician is more than presenting facts and data. While many patients want a share in decision making,[1] most expect recommendations from their doctor on how best to treat their illness. This form of communication includes some synthesis of information about the cancer and guidance for the individual patient.

For many, cancer is a serious, perhaps terminal diagnosis. Hearing information about cancer often evokes an emotional response from patients and their families, which may cloud their ability to fully hear and process information. One approach to education about communication advocates that clinicians’ responses to patients' emotional responses can enhance communication.[2]

### References

Lee SJ, Back AL, Block SD, et al.: Enhancing physician-patient communication. Hematology Am Soc Hematol Educ Program : 464-83, 2002.12446437
Back AL, Arnold RM, Baile WF, et al.: Approaching difficult communication tasks in oncology. CA Cancer J Clin 55 (3): 164-77, 2005 May-Jun.15890639

## Demographic and Cultural Considerations in Cancer Communication

Both patients’ and providers’ demographic and cultural characteristics, backgrounds, and experiences can influence communication preferences and styles and may, in turn, affect clinical outcomes. Demographic factors with a potential to affect communication in cancer care include, but are not limited to, age, gender and sexuality, race and ethnicity, and socioeconomic status. Cultural factors such as language, family structure, religion and spirituality, and even the culture of medical practice are also relevant.

A patient and his or her providers often have different demographic or cultural backgrounds and identities. Frameworks proposed to help guide providers in approaching the care of patients with backgrounds different from their own include the concepts of cultural competence and cultural humility. Some medical literature has suggested moving away from the idea of cultural competence, which encourages providers to study the values, beliefs, and behaviors of certain cultural groups, in favor of cultural humility, which promotes a “lifelong commitment to self-evaluation and self-critique, to redressing the power imbalances in the patient-physician dynamic, and to developing mutually beneficial and nonpaternalistic clinical and advocacy partnerships with communities on behalf of individuals and defined populations.”[1,2]

A wealth of oncological and nononcological literature explores demographic and cultural influences on communication, though like the bulk of communication literature in general, it leans toward observational and qualitative studies and is vulnerable to bias and overgeneralization. A comprehensive review of this literature is beyond the scope of this summary; however, some demographic and/or cultural trends relevant to communication in cancer care are noted in the literature, some of which is referenced in the table below.

### Demographic Influences on Cancer Communication

Table 1. Demographic Influences on Cancer Communication

Demographic Influences | Special Considerations
Age (i.e., pediatric, young adult, middle-aged, older adult) | • Younger patients tend to speak more and ask more questions in encounters with oncologists.[3]
Age (i.e., pediatric, young adult, middle-aged, older adult) | • Oncologists address the emotional aspects of illness more with younger patients.[3]
Age (i.e., pediatric, young adult, middle-aged, older adult) | • Older adult patients are at higher risk of sensory, functional, and cognitive deficits that affect communication.
Age (i.e., pediatric, young adult, middle-aged, older adult) | • Cancer patients >65 y have stronger preferences for written health information and phone calls versus emails and text messages, compared with younger patients.[4]
Age (i.e., pediatric, young adult, middle-aged, older adult) | • For more information about pediatric communication, see the Communication in Pediatric Oncology section.
Gender and sexuality (i.e., male, female, transgender, nonbinary, LGBTQ+) | • Women have more prognostic discussions with their providers and may have better prognostic understanding than men.[5]
Gender and sexuality (i.e., male, female, transgender, nonbinary, LGBTQ+) | • Women may be more interested than men in discussing emotional, social, and spiritual aspects of their illness and care.[6]
Gender and sexuality (i.e., male, female, transgender, nonbinary, LGBTQ+) | • LGBTQ+ patients may worry about sharing information about their sexual orientation or gender identity with providers but report improved alignment with providers, well-being, and quality of care when they do.[7]
Gender and sexuality (i.e., male, female, transgender, nonbinary, LGBTQ+) | • Oncologists report a desire to engage in open, nonjudgmental communication practices with LGBTQ+ cancer patients, but cite a lack of experience with transgender patients in particular and a fear of offending patients as barriers to providing affirming care.[8]
Race and ethnicity (i.e., American Indian or Alaska Native, Asian, Black/African American, Hispanic/Latino, Native Hawaiian or Pacific Islander, White, multiracial) | • Racial and ethnic minority patients consistently report unmet informational needs, and physicians underestimate the amount of illness-related information that minority patients want.[9-11]
Race and ethnicity (i.e., American Indian or Alaska Native, Asian, Black/African American, Hispanic/Latino, Native Hawaiian or Pacific Islander, White, multiracial) | • Oncologists spend more time building communication with White patients than with racial and ethnic minority patients.[3]
Race and ethnicity (i.e., American Indian or Alaska Native, Asian, Black/African American, Hispanic/Latino, Native Hawaiian or Pacific Islander, White, multiracial) | • Black cancer patients are more likely than White cancer patients to report dissatisfaction with patient-physician communication and report feeling less respected by their clinicians.[12-14]
Race and ethnicity (i.e., American Indian or Alaska Native, Asian, Black/African American, Hispanic/Latino, Native Hawaiian or Pacific Islander, White, multiracial) | • For more information about language barriers, see the Language and the use of interpreters section.
Socioeconomic status (i.e., high, middle, low) | • Oncologists may demonstrate less patient-centered communication relating to the illness experience for patients of lower socioeconomic status.[15]
Socioeconomic status (i.e., high, middle, low) | • Patients of lower socioeconomic status are less likely to have follow-up care discussions with oncology providers.[16]
Socioeconomic status (i.e., high, middle, low) | • Oncologists give more biomedical information to and spend more time relationship-building and providing psychosocial counseling for affluent patients.[3]

LGBTQ = lesbian, gay, bisexual, transgender, and queer.

#### Health literacy

In addition to the demographic and cultural disparities noted above, a patient’s health literacy level can also have a significant impact on cancer communication. The U.S. Department of Health and Human Services defines personal health literacy as “the degree to which individuals have the ability to find, understand, and use information and services to inform health-related decisions and actions for themselves and others.” Low health literacy has been frequently linked to worse health outcomes. Cancer patients with low health literacy may misunderstand details of their disease or treatment plan, which may, in turn, contribute to over- or under-treatment and poor adherence to a treatment plan.[17]

Health literacy is distinct from general literacy, though it is important to note that health information is often presented at a relatively advanced reading level. Lower education levels are associated with poor health literacy, but providers should not assume that patients with high educational attainment also have high health literacy, as many do not.[17,18] Older age has also been associated with poor health literacy.[19]

Various working groups and studies have sought to identify best practices for communicating with patients with low literacy skills. Recommendations include the following:

- Change the communication skills of the health care provider rather than those of the patient. The provider should bear primary responsibility for ensuring that patients understand their medical situation. Health literacy training for providers may be effective.[20]
- Use plain language that is free of medical jargon. Audiovisual aids may help, though complex technology may inhibit patients. Written information should be at the fifth-grade level or lower.[21,22]
- Health navigators and ombudsmen may help empower patients with low literacy skills.[23]
- Limit information given to patients at each interaction, especially if information is emotionally charged.
- Repeat important information, and use teach-back strategies to improve communication outcomes.[22]
- Make information and illustrations culturally relevant, and use the language(s) spoken by the target population.

#### Interventions to overcome disparities

While the causes of the disparities noted above are multifactorial and systemic in nature, greater provider awareness of implicit bias, the effects of structural racism, and social determinants of health is an important first step in reducing inequalities in care. While providers have an imperative to provide culturally sensitive and equitable care, patients can also be encouraged to communicate their concerns with their oncology providers to make their visits more patient centered.[15] Clinicians can strive to improve follow-up discussions and follow-up care in an effort to improve communication and patient outcomes.[16,24,25] Using clinical navigators may also help empower patients to communicate better with their oncologists.[26]

### Cultural Considerations in Cancer Communication

Various cultural factors such as language, family structure, and religion/spirituality may impact communication preferences and practices for both patients and providers. These factors are important to consider when practicing culturally sensitive care.

#### Language and the use of interpreters

Health care organizations should provide language assistance services for all patients who primarily speak a language different than their provider’s. Ideal services should include bilingual staff when possible and professional interpreters at each step of the visit and at no cost to the patient.[27] Clinicians should not use a patient’s family members or friends to interpret, as they may not communicate all information accurately and may be uncomfortable communicating emotionally difficult information. Professional telephone interpreters are about as accurate as in-person interpreters, [28] but in-person interpreters are preferable for conveying sensitive information, such as bad news or chemotherapy consent. Effective communication with a patient through an interpreter may be facilitated by a few key strategies:[29,30]

- It is helpful for the provider to introduce himself or herself to the interpreter before the encounter and briefly preview the planned conversation.
- In a bedside or office encounter, the interpreter should be positioned next to or slightly behind the patient.[30] If the patient is deaf and a sign language interpreter is used, the interpreter should be positioned so that the patient and interpreter have a full view of each other’s face and hands.
- Speak directly to the patient or family member while the interpreter is present. Avoid speaking about the patient in the third person.
- Speak in simple, brief phrases and avoid medical jargon.

#### Family roles in cancer care and communication

There has been a dearth of studies on the adaptive patterns of families in response to cancer, though research in this area is growing.[31] Family members of cancer patients often find themselves thrust into the medical environment with little or no time to emotionally and psychologically incorporate the diagnosis of a life-threatening illness into their lives.[32] Just as each cancer patient reacts to cancer differently, the family system reacts differently. Interaction between the cancer patient and the family unit must be constructed, redefined, negotiated, and renegotiated along the illness trajectory.[33]

Families react to the illness of their loved ones in various ways, but it is common for families to experience communication challenges. One study examined the phenomenon of avoidance of family communication about cancer.[34] In this study, interviews with 50 caregivers and 26 families were audiotaped and transcribed. Two-thirds of families (65%) experienced communication difficulties. Participants’ narratives pointed to three distinct thought processes that contributed to the phenomenon of avoidance: avoidance of psychological distress, desire for mutual protection against harmful situations, and belief in positive thinking.

In a randomized trial, investigators interviewed male and female cancer patients and asked how the family was affected by the cancer diagnosis. Almost all expressed the importance of concealing feelings of distress and unhappiness, stemming from a need to protect family and friends and to act normal. Also important were factors such as maintaining or returning to familiar routines and roles.[35]

Opening up lines of communication and encouraging mutual disclosure about cancer-related issues may be effective at reducing distress in relationships for cancer patients. One study of 148 couples facing breast cancer showed that reciprocal self-disclosure during cancer discussion was associated with lower levels of psychological distress.[36]

Another study suggested that family-focused psychotherapy may also help increase patients’ and their family members’ cancer-related communication. The study data was gathered from a large randomized controlled trial examining the effect of family-focused grief therapy on family bereavement outcomes. In the study, 257 patients and family members reported on their perception of cancer-related communication after each therapy session using a self-disclosure scale. Participants reported more cancer-related communication on average during therapy sessions compared with baseline; however, the long-term therapeutic effects on depressive symptoms and bereavement in family members depended on the listener's perceived responsiveness (responsiveness defined as “to what degree participants perceived the family as caring, understanding, and accepting of their communication”). Participants who perceived their families as highly responsive had lower depression and bereavement scores after the patient’s death if they had more cancer-related communication in the therapy sessions, while more communication was actually associated with worse bereavement outcomes for families who perceived low responsiveness.[37][level of evidence: I]

Expectations for the role of family members in cancer care and communication with the patient and providers regarding the disease course and treatment plan vary among cultures, as well. Some cultures place greater emphasis on communication with the family unit as a whole, while others focus more on individual patient independence and autonomy. While providers and researchers should use caution when attempting to generalize about specific cultures’ communication preferences, some of the literature identifies certain culturally relevant patterns, including the following:

- Families from Asian cultures may wish to be more involved in determining what information is presented to the patient and how it is delivered.[31]
- Latino families and patients may expect family members to be heavily involved in medical decision making throughout the illness trajectory.[31]
- African American patients may also rely heavily on family input with regard to medical decision making and for coping with their illness.[31]

Clinicians practicing cultural humility respectfully elicit from the patient and family not just information needed to make an accurate diagnosis, but also identify what matters most to them and negotiate mutually satisfactory goals for treatment.

#### Communicating about spirituality in cancer care

Spirituality is an important source of strength and coping for many people facing cancer. Research indicates that both patients and family caregivers commonly rely on spirituality and religion to help them deal with serious physical illnesses, expressing a desire to have medical staff acknowledge or address specific spiritual and religious needs and concerns.[38,39] For a detailed discussion of this topic, see Spirituality in Cancer Care.

### References

Epner DE, Baile WF: Patient-centered care: the key to cultural competence. Ann Oncol 23 (Suppl 3): 33-42, 2012.22628414
Tervalon M, Murray-García J: Cultural humility versus cultural competence: a critical distinction in defining physician training outcomes in multicultural education. J Health Care Poor Underserved 9 (2): 117-25, 1998.10073197
Siminoff LA, Graham GC, Gordon NH: Cancer communication patterns and the influence of patient characteristics: disparities in information-giving and affective behaviors. Patient Educ Couns 62 (3): 355-60, 2006.16860520
Saied A, Sherry SJ, Castricone DJ, et al.: Age-related trends in utilization of the internet and electronic communication devices for coordination of cancer care in elderly patients. J Geriatr Oncol 5 (2): 185-9, 2014.24495698
Fletcher K, Prigerson HG, Paulk E, et al.: Gender differences in the evolution of illness understanding among patients with advanced cancer. J Support Oncol 11 (3): 126-32, 2013.24400392
Seifart C, Riera Knorrenschild J, Hofmann M, et al.: Let us talk about death: gender effects in cancer patients' preferences for end-of-life discussions. Support Care Cancer 28 (10): 4667-4675, 2020.31955277
Cloyes KG, Hull W, Davis A: Palliative and End-of-Life Care for Lesbian, Gay, Bisexual, and Transgender (LGBT) Cancer Patients and Their Caregivers. Semin Oncol Nurs 34 (1): 60-71, 2018.29306523
Sutter ME, Simmons VN, Sutton SK, et al.: Oncologists' experiences caring for LGBTQ patients with cancer: Qualitative analysis of items on a national survey. Patient Educ Couns 104 (4): 871-876, 2021.32981814
Jean-Pierre P, Fiscella K, Griggs J, et al.: Race/ethnicity-based concerns over understanding cancer diagnosis and treatment plan. J Natl Med Assoc 102 (3): 184-9, 2010.20355347
Asare M, Peppone LJ, Roscoe JA, et al.: Racial Differences in Information Needs During and After Cancer Treatment: a Nationwide, Longitudinal Survey by the University of Rochester Cancer Center National Cancer Institute Community Oncology Research Program. J Cancer Educ 33 (1): 95-101, 2018.27097806
Moreno PI, Ramirez AG, San Miguel-Majors SL, et al.: Unmet supportive care needs in Hispanic/Latino cancer survivors: prevalence and associations with patient-provider communication, satisfaction with cancer care, and symptom burden. Support Care Cancer 27 (4): 1383-1394, 2019.30136022
Manfredi C, Kaiser K, Matthews AK, et al.: Are racial differences in patient-physician cancer communication and information explained by background, predisposing, and enabling factors? J Health Commun 15 (3): 272-92, 2010.20432108
Gordon HS, Street RL, Sharf BF, et al.: Racial differences in trust and lung cancer patients' perceptions of physician communication. J Clin Oncol 24 (6): 904-9, 2006.16484700
Do YK, Carpenter WR, Spain P, et al.: Race, healthcare access and physician trust among prostate cancer patients. Cancer Causes Control 21 (1): 31-40, 2010.19777359
Pollak KI, Alexander SC, Grambow SC, et al.: Oncologist patient-centered communication with patients with advanced cancer: exploring whether race or socioeconomic status matter. Palliat Med 24 (1): 96-8, 2010.19910397
DiMartino LD, Birken SA, Mayer DK: The Relationship Between Cancer Survivors' Socioeconomic Status and Reports of Follow-up Care Discussions with Providers. J Cancer Educ 32 (4): 749-755, 2017.27006193
Koay K, Schofield P, Jefford M: Importance of health literacy in oncology. Asia Pac J Clin Oncol 8 (1): 14-23, 2012.22369440
Helitzer D, Hollis C, Cotner J, et al.: Health literacy demands of written health information materials: an assessment of cervical cancer prevention materials. Cancer Control 16 (1): 70-8, 2009.19078933
Chesser AK, Keene Woods N, Smothers K, et al.: Health Literacy and Older Adults: A Systematic Review. Gerontol Geriatr Med 2: 2333721416630492, 2016 Jan-Dec.28138488
Khankari K, Eder M, Osborn CY, et al.: Improving colorectal cancer screening among the medically underserved: a pilot study within a federally qualified health center. J Gen Intern Med 22 (10): 1410-4, 2007.17653808
Communicating with patients who have limited literacy skills. Report of the National Work Group on Literacy and Health. J Fam Pract 46 (2): 168-76, 1998.9487325
Holmes-Rovner M, Stableford S, Fagerlin A, et al.: Evidence-based patient choice: a prostate cancer decision aid in plain language. BMC Med Inform Decis Mak 5: 16, 2005.15963238
Han HR, Lee H, Kim MT, et al.: Tailored lay health worker intervention improves breast cancer screening outcomes in non-adherent Korean-American women. Health Educ Res 24 (2): 318-29, 2009.18463411
Palmer NR, Weaver KE, Hauser SP, et al.: Disparities in barriers to follow-up care between African American and White breast cancer survivors. Support Care Cancer 23 (11): 3201-9, 2015.25821145
Arora NK, Reeve BB, Hays RD, et al.: Assessment of quality of cancer-related follow-up care from the cancer survivor's perspective. J Clin Oncol 29 (10): 1280-9, 2011.21357781
Nickell A, Burke NJ, Cohen E, et al.: Educating low-SES and LEP survivors about breast cancer research: pilot test of the Health Research Engagement Intervention. J Cancer Educ 29 (4): 746-52, 2014.24744119
Anderson LM, Scrimshaw SC, Fullilove MT, et al.: Culturally competent healthcare systems. A systematic review. Am J Prev Med 24 (3 Suppl): 68-79, 2003.12668199
Butow PN, Goldstein D, Bell ML, et al.: Interpretation in consultations with immigrant patients with cancer: how accurate is it? J Clin Oncol 29 (20): 2801-7, 2011.21670462
Misra-Hebert AD: Physician cultural competence: cross-cultural communication improves care. Cleve Clin J Med 70 (4): 289, 293, 296-8 passim, 2003.12701983
Juckett G, Unger K: Appropriate use of medical interpreters. Am Fam Physician 90 (7): 476-80, 2014.25369625
Harris J, Bowen DJ, Badr H, et al.: Family communication during the cancer experience. J Health Commun 14 (Suppl 1): 76-84, 2009.19449271
Mills ME, Sullivan K: The importance of information giving for patients newly diagnosed with cancer: a review of the literature. J Clin Nurs 8 (6): 631-42, 1999.10827609
Nussbaum JF, Baringer O, Kundrat A: Health, communication, and aging: cancer and older adults. Health Commun 15 (2): 185-92, 2003.12742769
Zhang AY, Siminoff LA: Silence and cancer: why do families and patients fail to communicate? Health Commun 15 (4): 415-29, 2003.14527866
Byrne A, Ellershaw J, Holcombe C, et al.: Patients' experience of cancer: evidence of the role of 'fighting' in collusive clinical communication. Patient Educ Couns 48 (1): 15-21, 2002.12220746
Manne S, Sherman M, Ross S, et al.: Couples' support-related communication, psychological distress, and relationship satisfaction among women with early stage breast cancer. J Consult Clin Psychol 72 (4): 660-70, 2004.15301651
Zaider TI, Kissane DW, Schofield E, et al.: Cancer-related communication during sessions of family therapy at the end of life. Psychooncology 29 (2): 373-380, 2020.31701610
Kim Y, Wellisch DK, Spillers RL, et al.: Psychological distress of female cancer caregivers: effects of type of cancer and caregivers' spirituality. Support Care Cancer 15 (12): 1367-74, 2007.17516094
Whitford HS, Olver IN, Peterson MJ: Spirituality as a core domain in the assessment of quality of life in oncology. Psychooncology 17 (11): 1121-8, 2008.18322902

## Education and Training in Cancer Communication

### Status of Education and Training in Cancer Communication

The American College of Graduate Medical Education recognizes interpersonal and communication skills as one of six core competencies.[1] While the importance of educating cancer doctors in communication is recognized, training in communication during oncology fellowship may be lacking. A 2003 survey of U.S. medical, radiation, and surgical oncology programs revealed that only one-third of programs reported offering communication skills training. Lack of faculty time and expertise were identified as the major barriers.[2] Similarly, in a survey by the American Society of Clinical Oncology, few attending oncologists reported receiving mentoring or specific training in communication skills, such as discussing prognosis.[3] Furthermore, while communication is taught to fellows, the quality of that teaching may be inferior. In a national survey of hematology-oncology fellows, 55% reported explicit education on end-of-life communication. However, fellows reported less observation and feedback on a communication skill than on a bone marrow biopsy.[4]

The lack of training is concerning, given how frequently oncologists engage in difficult communication tasks. In one study, oncologists reported delivering bad news an average of 35 times a month.[5] A Delphi panel of medical oncologists endorsed nearly 80% of items related to communication and decision making and advance care planning as within the scope of an oncologist’s work, suggesting that most oncologists put a high value on communication as a critical component of their work.[6]

In addition to training for oncologists and fellows, efforts have been made to train nurses. Nurses play a vital role in supporting patients through the crisis of cancer, often advocating for them and acting as intermediaries for their requests or concerns. Research suggests that communication skills training programs for nurses are well received.[7]

There have been several small studies of communication training programs for nurses, which demonstrated mixed results. They include the following:

- A communication skills training developed for physicians was adapted and given to 247 inpatient nurses. It included a 45-minute didactic on end-of-life (EOL) care, followed by 90 minutes of experiential learning, including a role-play with a simulated patient. Nurses’ confidence in discussing death, dying, and EOL goals of care increased after the training, and over 90% reported satisfaction with the module.[8]
- A small study taught nurses in Japan to use the SPIKES (Setting, Perception, Invitation, Knowledge, Empathy, Summary) protocol[9] with patients newly diagnosed with cancer. The study demonstrated that patients seen by trained nurses had decreased psychological distress, enhanced adaptive coping, and increased patient satisfaction with the nurse. Although the study was randomized, it enrolled a mere four nurses in each arm.[10,11] See Communication Tools and Techniques below.

While communication skills training is generally well received, improves self-rated confidence, and increases communication skills, it is unclear whether the skills are transferred to clinical practice. One study addressed this question by randomly assigning nurses who attended a 3-day communication skills workshop to 4 weeks of clinical supervision or a control group. Only those with the 4 weeks of supervision demonstrated a transfer of skills into clinical practice, and the effect was limited.[12]

In total, these studies suggest the ability of intensive and experiential training programs to improve skills acquisition and self-rated confidence. Few studies assess the effect of communication skills training on patient-oriented outcomes. These findings raise important questions about the value of communication training programs, many of which are labor intensive.

### Methods of Communication Skills Training

In recent years, increasing rigor has been applied to the design and assessment of communication skills education. Over the past two decades, more than 40 randomized controlled trials of communication skills training have been conducted in the United States,[13,14] the United Kingdom,[15] Europe,[16] Australia,[17] and Japan.[11] Methods for evaluating the success of the education varies. Some studies looked at self-assessment before and after training; others assessed the acquisition of behaviors or skills, such as learner response to emotion, using audio or video recordings of encounters in simulated interviews or patient encounters. Few of these studies linked communication training to patient outcomes, such as satisfaction, anxiety, or distress.

Participants: Training programs have targeted various learners, including oncology fellows, practicing oncologists, nurses, and other advanced practice providers. Program sizes have varied widely, with as few as 8 learners [11] and as many as 160 learners.[15]

Design: Most communication skills training programs involve intensive small-group sessions that require participants to practice skills in a role-play, using a standardized or simulated patient. One study suggested that role-plays with higher emotional content were more effective, perhaps because such encounters were more challenging for learners and demonstrated more differences in the untrained versus trained groups.[18] Communication skills training programs vary in length, from half-day to 3.5-day workshops to 105 hours of training.[16] A few include consolidation sessions.[12] Increasingly, the use of electronic and computerized methods of teaching is being explored,[19] with CD-ROMs given to participants.[20]

Assessment/outcomes: Varied assessment methods are used and depend in part on the study design and the targeted outcome(s) of the work. There are frequently pre- and post-assessments in the intervention and control groups, so the change in learning between the two groups can be compared. Common strategies for evaluation of communication skills training include:

- Self-assessment of skills and confidence.
- Observed skills via direct observation or recordings (audio or video) of encounters, such as:
  - Questions asked.
  - Decreased interruptions.
  - Use of empathy or emotional words.
- Satisfaction (of learners, patients, families).
- Patient outcomes (recognition of distress, level of patient anxiety).[21]

Examples of communication skills trainings: Several standardized training curricula have been developed and become more widely used over time. A few selected examples are mentioned in the table below.

Table 2. Communication Skills Training

Training Curricula | Design | Evidence
Vitaltalk | Provides instruction on communication areas, including developing a relationship, giving bad news, discussing goals of care and resuscitation preferences. | A few small studies indicate participant satisfaction with the training and perceived improvements in communication, but high-quality evidence on communication outcomes is limited.[14,22,23]
Comskil | Provides training on topics, including delivering serious news, discussing prognosis and treatment, maintaining team communication, and responding to patient and family anger. Primarily provided through Memorial Sloan Kettering Cancer Center. | A few small studies indicate participant satisfaction with the training and perceived improvements in communication, but high-quality evidence on communication outcomes is limited.[24-27]
SICG | Provides a structured, question-based framework to help clinicians “assess illness understanding and patient information preferences; share prognosis according to patient preferences; explore patient values, goals, and care preferences; and make a recommendation based on patient priorities.”[28] | The SICG was recently developed, and data on efficacy and outcomes is limited. Available data suggests the following:
SICG | | - The SICG improves rates and quality of EMR documentation of serious illness discussions.[28,29]
SICG | | - 79% of 118 patients described the discussion using the SICG as worthwhile and reported no change or improvement in their sense of peacefulness, hopefulness, or anxiety.[30]
SICG | | - Use of the SICG was associated with increased provider satisfaction.[30]

SICG = Serious Illness Conversation Guide; EMR = electronic medical record.

In summary, communication is a skill that can be taught. Key aspects of communication skills training include opportunities for learners to practice skills and receive feedback. Optimal duration is not known, and no studies compared shorter versus longer workshops to see whether there is a dose-response curve. The need for consolidation or booster lessons after the initial workshop is unclear, with some studies demonstrating substantially better outcomes and uptake of behaviors with additional lessons or consolidation workshops.[16,31]

### Communication Tools and Techniques

Some of the training referenced above focuses on specific tools to facilitate recollection and application or transfer of skills into clinical encounters. Evidence linking these tools to provider- or patient-related outcomes is extremely sparse, but as they are commonly used in practice, they have been included here. Three examples of such tools are discussed below:

- Ask-Tell-Ask
- NURSE
- SPIKES

#### Ask-Tell-Ask

Ask-Tell-Ask is a three-step strategy for facilitating open communication between clinicians and patients. It has also been successfully applied/used in settings to elicit learner goals and give feedback.[32-34] By starting with a question rather than immediately giving information, clinicians give the patient some element of control.

- The first "Ask" can elicit a patient’s understanding, goals, or values or obtain permission to give information. Following are two examples:
  - “Can you tell me what you know so far about your cancer?”
  - “Would it be OK if we start by talking about the findings on your recent scan?”
- The first "Ask" is followed by a "Tell" that focuses on giving the main message briefly and without jargon. For example:
  - “The scan tells us the treatment is not working as well as we’d hoped.”
- The second "Ask" ensures that the patient has fully heard and absorbed the information and is ready to move on. Following are two examples:
  - “It’s a lot to take in. What are the key things you will share with your family?”
  - “Are you ready to discuss next steps for treatment?”

This approach discourages clinicians from launching into long and detailed medical explanations. Instead, it encourages giving information in small chunks, frequently checking to ensure the patient is understanding and absorbing all that is being said.

#### NURSE: Tools for responding to emotion

Communication is challenging for cancer providers because it often involves conveying serious news, such as a diagnosis of cancer or a poor prognosis, which changes patients' expectations about the future. Patients typically have a strong emotional response to such news. While emotions are high, the ability to hear and comprehend cognitive information is impaired. By addressing emotions empathically, clinicians may help patients absorb the information and make decisions.

NURSE is a mnemonic device for five ways to respond to emotion:[33,35]

- Name: “It sounds as if you are very worried.”
- Understand: “I cannot imagine how it feels to hear this.”
- Respect: “You are asking the right questions and being a strong advocate.”
- Support: “I will be here to care for you no matter what happens.”
- Explore: “Tell me more about how you are feeling.”

#### SPIKES: A six-step approach to delivering bad news

SPIKES is a specific framework for talking to patients about bad news, such as a cancer recurrence or a treatment failure. It incorporates some of the principles of Ask-Tell-Ask and NURSE in its steps:[9]

- Setting: Arrange for privacy and minimize interruptions.
- Perception: Find out what the patient understands is happening medically.
- Invitation: Discover how much information the patient wants.
- Knowledge: Give information to the patient in small bites without jargon.
- Empathy: Address the patient’s emotions with empathy.
- Summary: Sum up the clinical information and make a plan for the next step.

### References

Swing SR: The ACGME outcome project: retrospective and prospective. Med Teach 29 (7): 648-54, 2007.18236251
Hoffman M, Ferri J, Sison C, et al.: Teaching communication skills: an AACE survey of oncology training programs. J Cancer Educ 19 (4): 220-4, 2004.15725639
Hilden JM, Emanuel EJ, Fairclough DL, et al.: Attitudes and practices among pediatric oncologists regarding end-of-life care: results of the 1998 American Society of Clinical Oncology survey. J Clin Oncol 19 (1): 205-12, 2001.11134214 21065021
Buss MK, Lessen DS, Sullivan AM, et al.: Hematology/oncology fellows' training in palliative care: results of a national survey. Cancer 117 (18): 4304-11, 2011.21365618
Baile WF, Kudelka AP, Beale EA, et al.: Communication skills training in oncology. Description and preliminary outcomes of workshops on breaking bad news and managing patient reactions to illness. Cancer 86 (5): 887-97, 1999.10463990
Bickel KE, McNiff K, Buss MK, et al.: Defining High-Quality Palliative Care in Oncology Practice: An American Society of Clinical Oncology/American Academy of Hospice and Palliative Medicine Guidance Statement. J Oncol Pract 12 (9): e828-38, 2016.27531376
Kennedy Sheldon L: Communication in oncology care: the effectiveness of skills training workshops for healthcare providers. Clin J Oncol Nurs 9 (3): 305-12, 2005.15973840
Coyle N, Manna R, Shen M, et al.: Discussing Death, Dying, and End-of-Life Goals of Care: A Communication Skills Training Module for Oncology Nurses. Clin J Oncol Nurs 19 (6): 697-702, 2015.26583634
Baile WF, Buckman R, Lenzi R, et al.: SPIKES-A six-step protocol for delivering bad news: application to the patient with cancer. Oncologist 5 (4): 302-11, 2000.10964998
Fukui S, Ogawa K, Ohtsuka M, et al.: A randomized study assessing the efficacy of communication skill training on patients' psychologic distress and coping: nurses' communication with patients just after being diagnosed with cancer. Cancer 113 (6): 1462-70, 2008.18661509
Fukui S, Ogawa K, Yamagishi A: Effectiveness of communication skills training of nurses on the quality of life and satisfaction with healthcare professionals among newly diagnosed cancer patients: a preliminary study. Psychooncology 20 (12): 1285-91, 2011.20737411
Heaven C, Clegg J, Maguire P: Transfer of communication skills training from workshop to workplace: the impact of clinical supervision. Patient Educ Couns 60 (3): 313-25, 2006.16242900
Back AL, Arnold RM, Tulsky JA, et al.: Teaching communication skills to medical oncology fellows. J Clin Oncol 21 (12): 2433-6, 2003.12805343
Back AL, Arnold RM, Baile WF, et al.: Efficacy of communication skills training for giving bad news and discussing transitions to palliative care. Arch Intern Med 167 (5): 453-60, 2007.17353492
Fallowfield L, Jenkins V, Farewell V, et al.: Efficacy of a Cancer Research UK communication skills training model for oncologists: a randomised controlled trial. Lancet 359 (9307): 650-6, 2002.11879860
Razavi D, Merckaert I, Marchal S, et al.: How to optimize physicians' communication skills in cancer care: results of a randomized study assessing the usefulness of posttraining consolidation workshops. J Clin Oncol 21 (16): 3141-9, 2003.12915605
Butow PN, Kazemi JN, Beeney LJ, et al.: When the diagnosis is cancer: patient communication experiences and preferences. Cancer 77 (12): 2630-7, 1996.8640715
Razavi D, Delvaux N, Marchal S, et al.: Testing health care professionals' communication skills: the usefulness of highly emotional standardized role-playing sessions with simulators. Psychooncology 9 (4): 293-302, 2000 Jul-Aug.10960927
Tulsky JA, Arnold RM, Alexander SC, et al.: Enhancing communication between oncologists and patients with a computer-based training program: a randomized trial. Ann Intern Med 155 (9): 593-601, 2011.22041948
Meropol NJ, Egleston BL, Buzaglo JS, et al.: A Web-based communication aid for patients with cancer: the CONNECT Study. Cancer 119 (7): 1437-45, 2013.23335150
Fujimori M, Shirai Y, Asai M, et al.: Effect of communication skills training program for oncologists based on patient preferences for communication when receiving bad news: a randomized controlled trial. J Clin Oncol 32 (20): 2166-72, 2014.24912901
Urban RR, Fay EE, Podgurski L, et al.: Pilot study of a condensed communication skills workshop for gynecologic oncology fellows. Gynecol Oncol Rep 30: 100492, 2019.31538106
Onishi E, Nakagawa S, Uemura T, et al.: Physicians' Perceptions and Suggestions for the Adaptation of a US-Based Serious Illness Communication Training in a Non-US Culture: A Qualitative Study. J Pain Symptom Manage 62 (2): 400-409.e3, 2021.33290856
Brown R, Bylund CL, Eddington J, et al.: Discussing prognosis in an oncology setting: initial evaluation of a communication skills training module. Psychooncology 19 (4): 408-14, 2010.19441006
Gueguen JA, Bylund CL, Brown RF, et al.: Conducting family meetings in palliative care: themes, techniques, and preliminary evaluation of a communication skills module. Palliat Support Care 7 (2): 171-9, 2009.19538799
Bylund CL, Brown R, Gueguen JA, et al.: The implementation and assessment of a comprehensive communication skills training curriculum for oncologists. Psychooncology 19 (6): 583-93, 2010.19484714
Bylund CL, Brown RF, Bialer PA, et al.: Developing and implementing an advanced communication training program in oncology at a comprehensive cancer center. J Cancer Educ 26 (4): 604-11, 2011.21541813
Paladino J, Bernacki R, Neville BA, et al.: Evaluating an Intervention to Improve Communication Between Oncology Clinicians and Patients With Life-Limiting Cancer: A Cluster Randomized Clinical Trial of the Serious Illness Care Program. JAMA Oncol 5 (6): 801-809, 2019.30870556
Lally K, Tuya Fulton A, Ducharme C, et al.: Using Nurse Care Managers Trained in the Serious Illness Conversation Guide to Increase Goals-of-Care Conversations in an Accountable Care Organization. J Palliat Med 23 (1): 112-115, 2020.31081710
Paladino J, Koritsanszky L, Nisotel L, et al.: Patient and clinician experience of a serious illness conversation guide in oncology: A descriptive analysis. Cancer Med 9 (13): 4550-4560, 2020.32363775
Delvaux N, Merckaert I, Marchal S, et al.: Physicians' communication with a cancer patient and a relative: a randomized study assessing the efficacy of consolidation workshops. Cancer 103 (11): 2397-411, 2005.15858816
French JC, Colbert CY, Pien LC, et al.: Targeted Feedback in the Milestones Era: Utilization of the Ask-Tell-Ask Feedback Model to Promote Reflection and Self-Assessment. J Surg Educ 72 (6): e274-9, 2015 Nov-Dec.26123726
Back AL, Arnold RM, Baile WF, et al.: Approaching difficult communication tasks in oncology. CA Cancer J Clin 55 (3): 164-77, 2005 May-Jun.15890639
Gaster B, Edwards K, Trinidad SB, et al.: Patient-centered discussions about prostate cancer screening: a real-world approach. Ann Intern Med 153 (10): 661-5, 2010.21079223
Smith RC: Patient-Centered Interviewing: An Evidence-Based Method. 2nd ed. Lippincott Williams & Wilkins, 2002.

## eHealth as a Communication Tool in Cancer Care

Another communication method that is increasingly used in cancer care is eHealth. The proliferation of mobile digital devices, software applications, and websites on the Internet has the potential to transform the ways in which people with cancer and their families seek and receive care for good or ill.

This section uses the term eHealth as an umbrella term for a wide variety of computer-based supports for patients and informal caregivers. It enumerates the goals and risks of eHealth-based interventions and summarizes the lessons learned to date. Studies of specific interventions are summarized after the introductory sections.

### Definition of eHealth

A wide variety of interventions may be included in a summary of eHealth and cancer communication. For clarity and brevity, however, no evaluations will be made of video or multimedia interventions available primarily via CD-ROM or DVD; websites, unless specifically designed as part of a studied intervention; or resources available on the Internet independent of the provider-patient relationship.[1] In addition, programs designed to educate health care providers that take advantage of computers and related technology will not be summarized. Several recent systematic reviews with broader inclusion criteria provide additional information.[2-4]

### Goals of eHealth

The goals of eHealth include the following:

- Enhancing communication among patients, clinicians, and family members, for example, to ensure that information is clear.
- Enhancing shared decision making.
- Optimizing management of patients' and informal caregivers' physical and psychological symptoms.
- Improving the communication of patient-reported concerns to the health care team.
- Changing health-related behaviors.
- Providing social support.
- Enhancing clinical trial enrollment.

### Potential Negative Effects of eHealth

The potentially negative effects of eHealth include the following:

- Access to unreliable or contradictory information about diagnosis, prognosis, treatment goals, and side effects or anticipated complications that can increase patient distress. Data suggest that there are not significant harms to patients accessing information online.[5] This finding may reflect the number of reputable websites maintained by disease-specific advocacy groups and professional societies.
- Erosion of trust in providers. There was an initial concern that online information may cause patients to second-guess or lose confidence in providers. At present, the limited data do not support this concern, as levels of trust remain high.[6,7]
- Increased demand on clinicians’ time. Clinicians help patients interpret information found online or respond to patients who expect timely responses to e-communications via email, text, or patient portals.
- Creation of a digital divide or disparity. One group of investigators conducted surveys and focus groups to describe patient and caregiver perspectives on information related to symptom management and decision support.[8] The preference was for face-to-face communication, although most recognized the potential value of eHealth in supporting decisions. Of note, however, 38% of participants rarely used computers.
- Computers in the examination room.

### Summary of eHealth

The majority of the experience to date is based on pilot studies designed to evaluate acceptability and measure preliminary effect sizes. Observations based on these studies include the following:

- Most interventions were developed without an underlying theoretical framework. When a framework was cited, coping was the most frequently cited.[9] The goal was largely to enhance coping by giving patients additional resources such as information, greater access to clinicians, or education to improve their communication competence.
- The increased connectedness fostered by websites and mobile applications are driven by factors such as convenience, ease of use, and greater consumer choice and may not translate well into health care interactions.
- The tested communication technologies have varied widely. A systematic review related to end-of-life communication identified 11 technologies: video, prototype website, telephone, videoconferencing, email prompts, telemonitoring, Internet search strategies, compact disc, fax, mobile devices, and text messaging.[2]
- Digital or web-based strategies potentially provide cost-effective dissemination of standardized and (presumably) experimentally validated interventions. However, the use of care coordinators during the interactions may limit the scalability of the intervention.[10,11]
- The types of information or interactions and how patients and family caregivers access the resources and the desired format of the resources will require elucidation.[12]
- A related challenge is the difficulty of formally evaluating rapidly advancing and overlapping eHealth technologies. For example, websites, automatic texting, or mobile applications may possess advantages or disadvantages, but conducting trials to isolate the effect of a particular technology is time consuming and unlikely to provide a single best solution.
- Patient preferences and changes in preferences with generational shifts will likely require developers to modify the content and format of resources and the technology to access the resources. Differences in digital competence and comfort based on age, ethnicity, and socioeconomic factors will require clinicians to maintain channels of communication in both digital and nondigital environments.[13]
- Digital or web-based strategies often require significant self-directed effort on the part of the patient.[14] The willingness of patients to interact with multiple platforms over time is a potential limit to the efficacy of such interventions.

### References

Bouma G, Admiraal JM, de Vries EG, et al.: Internet-based support programs to alleviate psychosocial and physical symptoms in cancer patients: a literature analysis. Crit Rev Oncol Hematol 95 (1): 26-37, 2015.25701515
Ostherr K, Killoran P, Shegog R, et al.: Death in the Digital Age: A Systematic Review of Information and Communication Technologies in End-of-Life Care. J Palliat Med 19 (4): 408-20, 2016.26713368
Allsop MJ, Taylor S, Mulvey MR, et al.: Information and communication technology for managing pain in palliative care: a review of the literature. BMJ Support Palliat Care 5 (5): 481-9, 2015.24644214
Wasilewski MB, Stinson JN, Cameron JI: Web-based health interventions for family caregivers of elderly individuals: A Scoping Review. Int J Med Inform 103: 109-138, 2017.28550996
Crocco AG, Villasis-Keever M, Jadad AR: Analysis of cases of harm associated with use of health information on the internet. JAMA 287 (21): 2869-71, 2002.12038937
Hesse BW, Nelson DE, Kreps GL, et al.: Trust and sources of health information: the impact of the Internet and its implications for health care providers: findings from the first Health Information National Trends Survey. Arch Intern Med 165 (22): 2618-24, 2005 Dec 12-26.16344419
Hesse BW, Moser RP, Rutten LJ: Surveys of physicians and electronic health information. N Engl J Med 362 (9): 859-60, 2010.20200398
Cooley ME, Nayak MM, Abrahm JL, et al.: Patient and caregiver perspectives on decision support for symptom and quality of life management during cancer treatment: Implications for eHealth. Psychooncology 26 (8): 1105-1112, 2017.28430396
Lazarus RS, Folkman S: Stress, Appraisal, and Coping. Springer Publishing Co, 1984.
Steel JL, Geller DA, Kim KH, et al.: Web-based collaborative care intervention to manage cancer-related symptoms in the palliative care setting. Cancer 122 (8): 1270-82, 2016.26970434
Donovan HS, Ward SE, Sereika SM, et al.: Web-based symptom management for women with recurrent ovarian cancer: a pilot randomized controlled trial of the WRITE Symptoms intervention. J Pain Symptom Manage 47 (2): 218-30, 2014.24018206
DuBenske LL, Gustafson DH, Namkoong K, et al.: CHESS improves cancer caregivers' burden and mood: results of an eHealth RCT. Health Psychol 33 (10): 1261-72, 2014.24245838
Hesse BW, Greenberg AJ, Rutten LJ: The role of Internet resources in clinical oncology: promises and challenges. Nat Rev Clin Oncol 13 (12): 767-776, 2016.27273045
Wootten AC, Abbott JA, Meyer D, et al.: Preliminary results of a randomised controlled trial of an online psychological intervention to reduce distress in men treated for localised prostate cancer. Eur Urol 68 (3): 471-9, 2015.25454611

## Communication Challenges in Oncology

### Diagnostic Disclosure and Breaking Bad News

Oncologists break bad news to patients thousands of times in their careers, whether related to a diagnosis of new or recurrent cancer, disease progression, disease- or treatment-related prognosis, or transitions to end-of-life (EOL) care. Disclosing a new cancer diagnosis is a frequent and significant communication challenge for oncologists.

This process is made difficult by the following factors:[1-4]

- Oncologists are rarely trained in techniques for giving bad news.
- Physicians often experience negative emotions, such as anxiety and fear of being blamed when they must tell patients that treatment has not worked.
- Physicians may react to patient emotions by offering false hope or premature reassurance.
- Physicians may omit important information from the disclosure.
- Oncologists’ own death anxiety may affect their confidence and comfort in discussing EOL topics.[5]

While much has been written about breaking bad news, there is limited level I evidence to support the use of a specific method for disclosing difficult news to cancer patients. What is clear is that not discussing the diagnosis may engender in patients feelings of isolation, anxiety, lack of autonomy or control, psychological abandonment, mistrust, suspicion, and a sense of betrayal. On the other hand, open discussion of the diagnosis decreases uncertainty, improves participation in decisions about care, allows access to psychological support, encourages self-care, and allows planning for the future.[6]

In an innovative qualitative study focused on communicating bad news related to cancer recurrence,[7] patients with diagnoses of gastrointestinal cancers during the previous 2 years listened to audio recordings of oncologists using the SPIKES (Setting, Perception, Invitation, Knowledge, Empathy, Summary) approach (with standardized actors) and then identified what they liked and disliked about the communication. Three major themes were identified:

- Recognition, which involved the physician acknowledging or reflecting the patient’s emotional response, without becoming overly emotional or offering platitudes.
- Guidance, which referred to the physician remaining in charge of the dialogue, pointing out the patient’s strengths, and offering positive recommendations.
- Responsiveness, which involved the physician moving back and forth between providing recognition and guidance using an interactive, rather than lecturing, style. Patients consistently noted that they did not like the physician beginning the communication of bad news with words such as “unfortunately.”

General principles, outlined by the American Society of Clinical Oncology (ASCO),[8] offer the oncologist approaches to discussing diagnostic information. The ASCO group consensus was that the oncologist should provide information tailored to the patient’s needs, providing hope and reassurance without misleading the patient. This is done by assessing patient and family preferences for information, setting an agenda, providing news in appropriately targeted language for the health literacy level of the patient and family, responding to emotion, and providing a structure for follow-up care that limits patients’ experience of abandonment.

Patients with new diagnoses of cancer preferred their physicians to give them the diagnosis in person rather than by phone and in private settings. In addition, they wanted their physicians to spend adequate time (>10 minutes) and to be prepared to describe treatment options.[9,10] These factors were associated with higher patient satisfaction ratings, as were patient-associated factors, such as feeling empowered to ask questions during the encounter, and physician-associated behavior and communication, such as using lay language and eliciting patients’ concerns about their health, which demonstrated caring and confidence.[10]

A study of 351 patients with a variety of cancers at different stages and who were seen at M.D. Anderson Cancer Center elicited patient communication preferences when they were given bad news about an initial cancer diagnosis or recurrence.[11] The highest rated elements included the following:

- The doctor being up to date on the latest research on the patient’s cancer.
- The doctor informing the patient about the best treatment options and taking time to answer all patient questions.
- The doctor being honest about the severity of the condition.
- The doctor using simple, clear language, giving the news directly, and giving full attention to the patient.

Differences were noted in patient preferences based on sex, age, and level of education, underscoring the importance of tailoring the discussion to the individual patient. Cancer type did not predict patient preferences. It is important for a physician to elicit patient perspective on his or her condition because many incorrect beliefs can be clarified for the patient’s benefit.

Oncologists continue to struggle with a lack of consistency and equality in patient communication at the time of diagnosis. This experience has been demonstrated in a study of 405 women with newly diagnosed breast cancer, which found that White and more affluent patients had more interpersonal relationship-building moments within their initial diagnostic consultation. Oncologists may benefit from self-reflection and communication skills training to increase their awareness of unconscious bias.[12]

### Discussing Prognosis

#### Preference for information about prognosis

Patients with life-limiting illnesses desire information about prognosis,[13] believe that such information may be provided without compromising hope,[14] and prefer that oncologists inquire about their preferences for such information.[15] Younger patient age, female sex, and a shorter life expectancy as perceived by the patient correlate with increased information needs.[16]

A consistent finding over the last two decades is that patients with advanced cancer are typically overly optimistic about their life expectancies or the potential for cure with cancer-directed therapies.

- In a study of 1,193 patients in the Cancer Care Outcomes Research and Surveillance (CanCORS) Consortium, a significant majority of patients with advanced lung or colorectal cancer did not understand that treatment was not curative. Sixty-nine percent of patients did not understand that chemotherapy was unlikely to cure their cancers.[17] Patients who were not White, were diagnosed with colorectal cancer, or reported satisfaction with physician communication were more likely to report inaccurate understanding of treatment intent.
- Similarly, 64% of patients with incurable lung cancer who received radiation therapy did not understand that it was not likely to cure their cancers. Older and non-White patients were more likely to misunderstand; surrogates of patients were more likely to understand.[18]

There are many potential barriers to a more accurate understanding of prognosis, including poor communication by oncology clinicians. However, patients also interpret information for reasons unrelated to the quality of communication. The perspectives of patients with advanced cancer who enroll in phase I clinical trials or surrogate decision makers for patients in intensive care units (ICUs) provide some insights into why advanced cancer patients might misinterpret prognostic information.

- Patients’ optimistic expectations of benefit from phase I trials were associated with a better quality of life, stronger religious faith, optimism, poorer numeracy (ability to understand a statistical estimate of treatment outcome), and monetary risk seeking. They were unrelated to age, gender, educational level, or functional status.[19]
- In a study of 163 patients enrolled in a phase I trial, most were aware of hospice (81%) or palliative care (84%), but few considered either choice seriously (hospice, 10%; palliative care, 7%). Seventy-five percent of patients reported the most important influence was awareness that their cancer was growing; 63% of them stated the knowledge that the phase I drug killed cancer cells was the most important factor in their decision to enroll.[20]
- In a study of 80 surrogate decision makers recruited from the families of ICU patients, most were fairly accurate in their interpretations of quantitative information and less ambiguous qualitative estimates by ICU physicians. However, several potentially relevant sources of prognostic misunderstanding included the need to express optimism, the belief that the patients’ fortitude would lead to better-than-predicted outcomes, and a disbelief that physicians can predict accurately.[21]

One group of investigators analyzed the prognostic estimates of 917 adults with metastatic colorectal or lung cancer who were enrolled in the Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatments and their physicians.[22] There were three notable findings:

- Patients were more optimistic than physicians.
- Physician estimates were more calibrated with the observed survival than were the patient estimates.
- Patients who were more optimistic than their oncologists were more likely to prefer life-extending treatments.

The poor concordance between patients and oncology clinicians has been observed in a diverse range of patients, including patients with acute myeloid leukemia [23] and those considering allogeneic stem cell transplantation.[24] For additional information about patient prognostic understanding, see the Patients’ Interpretations of Prognostic Information section in Planning the Transition to End-of-Life Care in Advanced Cancer.

#### Oncologist self-reported practices in prognostic communication

There is evidence that physicians’ attitudes toward prognostic communication influence patients’ prognostic awareness. In an analysis of physician surveys from the Cancer Care Outcomes Research and Surveillance (CanCORS) Consortium,[25] investigators reported that patients with metastatic lung or colorectal cancer were more likely to have an accurate prognostic awareness if their most important doctor reported discussing prognosis earlier rather than waiting for deterioration (18.5% vs. 7.6%; odds ratio, 3.23; 95% confidence interval, 1.39–7.52; P = .006). Thus, understanding the factors that influence oncologists’ attitudes is relevant to improving prognostic communication. Two additional surveys of American oncologists and communication about prognosis have been published. One study analyzed the survey responses of 729 oncologists (64% response rate).[26] Almost all (98%) indicated they would disclose a terminal prognosis, but 48% indicated they would do so only when the patient’s preference for disclosure of prognosis was known. Fewer than half (43%) of the oncologists always provided an estimate of time until death. Three-quarters of them indicated they had not received formal training in communication of terminal prognoses; 96% thought training should be mandatory.

Another study reported that 65% of physicians surveyed discussed prognosis immediately with asymptomatic patients who had advanced cancer and anticipated life expectancies of 4 to 6 months.[27] However, fewer physicians would immediately discuss resuscitation preference (44%), hospice (26%), or preferred site of death (21%), with most physicians waiting for patient symptoms to appear or until there were no more treatments to offer. Younger physicians, surgeons, and oncologists were more likely than noncancer specialists to discuss prognosis.

For more information, see Planning the Transition to End-of-Life Care in Advanced Cancer.

### Discussing Consent for Cancer-Directed Therapy

Decision making in the setting of a cancer diagnosis presents its unique set of challenges. The choices can range from curative to palliative treatment, from surgery to radiation to chemotherapy, all with a broad potential side effect profile that could be either short- or long-term. There is increasing research into how providers approach treatment conversations with patients and how to actively involve them and to make sure their preferences are an important part of treatment decision making.

The ASCO published a consensus guideline for patient-clinician communication. In addition to guidance regarding core communication skills and tasks that apply across the continuum of cancer care, recommendations address specific topics, such as discussion of goals of care and prognosis, treatment selection, EOL care, facilitating family involvement in care, and clinician training in communication skills. Recommendations are accompanied by suggested strategies for implementation. Additional information (https://old-prod.asco.org/practice-patients/guidelines/supportive-care-and-treatment-related-issues) is available.[8]

When considering how to approach discussions about cancer-directed therapy with a patient, a provider should take into account the patient’s preferred approach to decision making. In a meta-analysis, 26% of patients preferred active roles, 49% preferred collaborative roles, and 25% preferred passive roles in treatment decision making.[28] Forty percent of patients in the study had discordance between their preferred communication role and their experience in the clinic setting. Evaluation of a patient’s preferred communication style should be considered at initial intake so that clinicians can use the preferred style during patient encounters for treatment decision making.

Patients with colon and breast cancer were given questionnaires directly after a consultation with their oncologist and then 3 months later. The questionnaires assessed their preferred and perceived decision-making styles, physician empathy, and shared decision making and the impact on patients’ decision regret.[29] Greater physician empathy was significantly associated with more shared decision making and less decision regret. If patients participated less than they desired in their visits, they reported more decision regret with their follow-up. This finding emphasizes the need for physician empathy, as well as the need to match patients’ preferred and perceived roles in medical decision making to enhance treatment decision making and minimize regret.

Patients who are candidates for palliative treatment alone can face different barriers to shared decision making. Faced with treatment that is not curative, some patients prefer to know less, and others desire significantly more information about treatment side effects, response rate, and prognosis. Clinical factors are the primary indicator for treatment options that an oncologist presents, but if all clinical factors are even, emotion is a strong influence. When chemotherapy near the EOL is being considered, oncologists feel that patients drive the desire for the treatment.[30] Despite that, the majority of patients in another study clearly desired to receive information on tumor response (91%) and survival benefit (74%). Oncologists, though, had difficulty judging the information preferences of individual patients.[31]

### Transitions in Care, Advance Care Planning, and EOL Care

Effective communication between patients, caregivers and providers is central to transitioning from disease-directed to comfort-focused treatment plans. Prognostic disclosure; eliciting patient goals, values and preferences; advance care planning; and EOL care discussions are integral to providing quality cancer care. These topics are discussed in detail in Planning the Transition to End-of-Life Care in Advanced Cancer.

### Communication About the Costs of Cancer Care

The cost of cancer care has attracted increased attention with the development of new, more expensive chemotherapies, immunotherapies, and genomic treatment. As reported in 2018, the average monthly price of anticancer drug therapy was $13,176 (range, $5,454–$45,004), with an average increase of 9% from 2006 to 2015.[32] Research on communication and cancer costs is an emerging field, but data are limited. Communication about cancer treatment costs have been limited by the lack of education in medical school about health care systems, quality improvement, and medical economics. This gap impacts the physician’s ability to integrate comparative effectiveness into medical decision making.[33] Compounding this deficiency is the variability of health care costs and insurance drug coverage, resulting in a lack of transparency in the cost of cancer care. Although most people in the United States have insurance coverage, their out-of-pocket costs can still be quite significant, resulting in double the personal bankruptcy rates of the general population.[34]

Research shows that the majority of patients want cost-information discussions with their oncologist or another health care provider and that most oncologists believe that a cost discussion is important. However, these conversations are infrequent.[35,36] In one study, 80% of patients had no negative feelings toward their oncologist after hearing cost information.[37] In contrast, the minority of oncologists feel comfortable discussing costs with patients.[38] One of the concerns related to cancer treatment cost is medication nonadherence. Patients with high or overwhelming financial distress or those who experience a higher financial burden than expected were more likely to skip doses of chemotherapy, take a reduced dose than that prescribed, or not fill a prescription at all because of cost.[35]

In one study, 57% of patients who did have a cost conversation reported lower out-of-pocket costs. Data show that 52% to 59% of patients wanted to discuss out-of-pocket costs with their physician, but most patients did not consider out-of-pocket costs in their decision making and did not believe their physician should, either.[39,40]

Research needs to persist in this area. Clinicians should assess their patients’ level of concern about the cost of cancer therapy and be willing to address the needs and questions of those in financial distress or refer them to a financial counselor.

### References

Baile WF, Buckman R, Lenzi R, et al.: SPIKES-A six-step protocol for delivering bad news: application to the patient with cancer. Oncologist 5 (4): 302-11, 2000.10964998
Hietanen P, Aro AR, Holli K, et al.: Information and communication in the context of a clinical trial. Eur J Cancer 36 (16): 2096-104, 2000.11044647
Buckman R: Communications and emotions. BMJ 325 (7366): 672, 2002.12351345
Baile WF: Training oncology practitioners in communication skills. J Pediatr Hematol Oncol 33 (Suppl 2): S115-22, 2011.21952567
Harnischfeger N, Rath HM, Alt-Epping B, et al.: Association between oncologists' death anxiety and their end-of-life communication with advanced cancer patients. Psychooncology 32 (6): 923-932, 2023.37057315
Arber A, Gallagher A: Breaking bad news revisited: the push for negotiated disclosure and changing practice implications. Int J Palliat Nurs 9 (4): 166-72, 2003.12734453
Back AL, Trinidad SB, Hopley EK, et al.: What patients value when oncologists give news of cancer recurrence: commentary on specific moments in audio-recorded conversations. Oncologist 16 (3): 342-50, 2011.21349951
Gilligan T, Coyle N, Frankel RM, et al.: Patient-Clinician Communication: American Society of Clinical Oncology Consensus Guideline. J Clin Oncol 35 (31): 3618-3632, 2017.28892432
Figg WD, Smith EK, Price DK, et al.: Disclosing a diagnosis of cancer: where and how does it occur? J Clin Oncol 28 (22): 3630-5, 2010.20606078
Kuroki LM, Zhao Q, Jeffe DB, et al.: Disclosing a diagnosis of cancer: considerations specific to gynecologic oncology patients. Obstet Gynecol 122 (5): 1033-9, 2013.24104784
Parker PA, Baile WF, de Moor C, et al.: Breaking bad news about cancer: patients' preferences for communication. J Clin Oncol 19 (7): 2049-56, 2001.11283138
Siminoff LA, Graham GC, Gordon NH: Cancer communication patterns and the influence of patient characteristics: disparities in information-giving and affective behaviors. Patient Educ Couns 62 (3): 355-60, 2006.16860520
Fried TR, Bradley EH, O'Leary J: Prognosis communication in serious illness: perceptions of older patients, caregivers, and clinicians. J Am Geriatr Soc 51 (10): 1398-403, 2003.14511159
Hagerty RG, Butow PN, Ellis PM, et al.: Communicating with realism and hope: incurable cancer patients' views on the disclosure of prognosis. J Clin Oncol 23 (6): 1278-88, 2005.15718326
Hagerty RG, Butow PN, Ellis PM, et al.: Communicating prognosis in cancer care: a systematic review of the literature. Ann Oncol 16 (7): 1005-53, 2005.15939716
Elkin EB, Kim SH, Casper ES, et al.: Desire for information and involvement in treatment decisions: elderly cancer patients' preferences and their physicians' perceptions. J Clin Oncol 25 (33): 5275-80, 2007.18024875
Weeks JC, Catalano PJ, Cronin A, et al.: Patients' expectations about effects of chemotherapy for advanced cancer. N Engl J Med 367 (17): 1616-25, 2012.23094723
Chen AB, Cronin A, Weeks JC, et al.: Expectations about the effectiveness of radiation therapy among patients with incurable lung cancer. J Clin Oncol 31 (21): 2730-5, 2013.23775958
Weinfurt KP, Castel LD, Li Y, et al.: The correlation between patient characteristics and expectations of benefit from Phase I clinical trials. Cancer 98 (1): 166-75, 2003.12833469
Agrawal M, Grady C, Fairclough DL, et al.: Patients' decision-making process regarding participation in phase I oncology research. J Clin Oncol 24 (27): 4479-84, 2006.16983117
Zier LS, Sottile PD, Hong SY, et al.: Surrogate decision makers' interpretation of prognostic information: a mixed-methods study. Ann Intern Med 156 (5): 360-6, 2012.22393131
Weeks JC, Cook EF, O'Day SJ, et al.: Relationship between cancer patients' predictions of prognosis and their treatment preferences. JAMA 279 (21): 1709-14, 1998.9624023
Sekeres MA, Stone RM, Zahrieh D, et al.: Decision-making and quality of life in older adults with acute myeloid leukemia or advanced myelodysplastic syndrome. Leukemia 18 (4): 809-16, 2004.14762444
Lee SJ, Fairclough D, Antin JH, et al.: Discrepancies between patient and physician estimates for the success of stem cell transplantation. JAMA 285 (8): 1034-8, 2001.11209174
Liu PH, Landrum MB, Weeks JC, et al.: Physicians' propensity to discuss prognosis is associated with patients' awareness of prognosis for metastatic cancers. J Palliat Med 17 (6): 673-82, 2014.24742212
Daugherty CK, Hlubocky FJ: What are terminally ill cancer patients told about their expected deaths? A study of cancer physicians' self-reports of prognosis disclosure. J Clin Oncol 26 (36): 5988-93, 2008.19029419
Keating NL, Landrum MB, Rogers SO, et al.: Physician factors associated with discussions about end-of-life care. Cancer 116 (4): 998-1006, 2010.20066693
Singh JA, Sloan JA, Atherton PJ, et al.: Preferred roles in treatment decision making among patients with cancer: a pooled analysis of studies using the Control Preferences Scale. Am J Manag Care 16 (9): 688-96, 2010.20873956
Nicolai J, Buchholz A, Seefried N, et al.: When do cancer patients regret their treatment decision? A path analysis of the influence of clinicians' communication styles and the match of decision-making styles on decision regret. Patient Educ Couns 99 (5): 739-46, 2016.26658703
Bluhm M, Connell CM, De Vries RG, et al.: Paradox of Prescribing Late Chemotherapy: Oncologists Explain. J Oncol Pract 12 (12): e1006-e1015, 2016.27650843
Oostendorp LJ, Ottevanger PB, van de Wouw AJ, et al.: Patients' Preferences for Information About the Benefits and Risks of Second-Line Palliative Chemotherapy and Their Oncologist's Awareness of These Preferences. J Cancer Educ 31 (3): 443-8, 2016.25985960
Saluja R, Arciero VS, Cheng S, et al.: Examining Trends in Cost and Clinical Benefit of Novel Anticancer Drugs Over Time. J Oncol Pract 14 (5): e280-e294, 2018.29601250
Patel MS, Davis MM, Lypson ML: Advancing medical education by teaching health policy. N Engl J Med 364 (8): 695-7, 2011.21345098
Ramsey S, Blough D, Kirchhoff A, et al.: Washington State cancer patients found to be at greater risk for bankruptcy than people without a cancer diagnosis. Health Aff (Millwood) 32 (6): 1143-52, 2013.23676531
Bestvina CM, Zullig LL, Rushing C, et al.: Patient-oncologist cost communication, financial distress, and medication adherence. J Oncol Pract 10 (3): 162-7, 2014.24839274
Henrikson NB, Tuzzio L, Loggers ET, et al.: Patient and oncologist discussions about cancer care costs. Support Care Cancer 22 (4): 961-7, 2014.24276955
Kelly RJ, Forde PM, Elnahal SM, et al.: Patients and Physicians Can Discuss Costs of Cancer Treatment in the Clinic. J Oncol Pract 11 (4): 308-12, 2015.26015459
Shih YT, Chien CR: A review of cost communication in oncology: Patient attitude, provider acceptance, and outcome assessment. Cancer 123 (6): 928-939, 2017.27893929
Zafar SY, Chino F, Ubel PA, et al.: The utility of cost discussions between patients with cancer and oncologists. Am J Manag Care 21 (9): 607-15, 2015.26618364
Bullock AJ, Hofstatter EW, Yushak ML, et al.: Understanding patients' attitudes toward communication about the cost of cancer care. J Oncol Pract 8 (4): e50-8, 2012.23180999

## Communication in Pediatric Oncology

In recent years, high-quality communication has been identified as both a standard of care and a top research priority in the fields of pediatric oncology and pediatric palliative care.[1,2]

### Prognostic Communication With Parents

Over the past decade, clinical research has helped provide insight into improving prognostic communication in pediatric oncology. Many parents find news about their child’s prognosis upsetting, but they want to hear as much information as possible.[3,4] When information is upsetting, they tend to want more detail.[3] Instead of extinguishing hope, honest prognostic communication promotes it by facilitating informed decision making, even when the prognosis is poor.[5-7]

One study confirmed these findings in a longitudinal, prospective, questionnaire-based cohort study. In a survey of 156 parents of children with cancer who were treated at two academic pediatric hospitals, the vast majority wanted to hear about prognosis in as much detail as possible, and 85% considered a numeric estimate to be important. This desire for detailed information did not change with time. At the time of diagnosis and at 4 months and 12 months later, 87%, 85%, and 84% of parents, respectively, preferred to hear about prognosis in as much detail as possible. Furthermore, parents were more likely to be satisfied with prognostic disclosure if it had been discussed at diagnosis and then again before the 4-month point.[8] However, the same study population also reported receiving high-quality physician communication and had a trusting relationship with their child’s oncologist, despite reporting overly optimistic prognostic estimates.[9]

A study also evaluated the impact of race and ethnicity in prognostic communication among 357 parents of children with cancer and their physicians.[10] Again, regardless of race, parents wanted as much detail as possible about the child’s prognosis. Physicians in this study incorrectly estimated the needs of minority patients.

### Communication Regarding Clinical Trials

Participating in cancer clinical trials requires parents to weigh the potential benefit of longer survival against the potential risk of unknown or increased toxicities. Most children in the United States with newly diagnosed cancer participate in a clinical research trial. A multisite study of the informed consent communication process for randomized controlled trials for childhood leukemia revealed that 50% of the 137 parents enrolled did not understand the randomization process.[11]

In general, children aged 7 to 18 years must provide their assent before enrolling in a trial. However, a study of 37 children with cancer who were enrolled in a clinical trial revealed that 51% did not know or recall that their treatment involved research. In addition, although all expressed a desire to be involved in decision making, 49% did not recall having a role in the decision to enroll in the trial.[12] A study looking at parents’ and adolescents’ inclinations toward a study involving intensified or reduced therapy revealed divergent inclinations, highlighting the need for communication with both parents and adolescents during the informed consent process.[13]

Phase I clinical trials in particular require clear communication between provider and parent or patient, given that these trials offer minimal prospect of direct benefit to the child. In one study, 85 informed-consent conferences for phase I research between June 2008 and May 2011 were directly observed, and 60 parents were subsequently interviewed. Results showed that only 32% of parents demonstrated a substantial understanding of the scientific purpose of phase I cancer trials.[14] On the basis of these results, attempts to develop tools to improve communication have been published.[15]

### Prognostic Communication With Children

Studies show that children wish to be informed about their illness and plans for treatment.[16] Although children’s information needs may be age dependent, most children worry about the impact of the disease and medical treatments on their daily lives and on others around them. Studies also show that when information—even if unfavorable—is withheld from children, the silence exacerbates the child’s fears and fantasies.[17] A study published in 2018 explored the development of an understanding of death in a group of 136 children aged 4 to 11 years.[18] It found that children understood key aspects of death as young as age 4 or 5 years, with the understanding of irreversibility and the cessation of mental and physical processes also emerging during early childhood.

In a cross-sectional study of 131 caregivers of children who died of cancer, two-thirds of caregivers reported talking to their child about death or dying.[19] When asked how staff could best support caregivers to have these conversations, most caregivers suggested offering resources on how to have these conversations with a child. Few caregivers wanted clinicians to talk to the child themselves or be in the room while the caregiver talked to the child.

### Communication With Adolescents

Navigating communication with adolescents with serious, potentially progressive illness can be challenging. There are ethical issues of autonomy, as well as a general lack of evidence regarding the exact timing and extent of information sharing.[20] Studies indicate that although most adolescents with long-term illness want to participate in medical decision making, when and how much they want to be involved are variable.[21,22] A single-institution longitudinal study on prognostic communication for adolescents and young adults found that 85% found prognostic information was very important/extremely important at the time of diagnosis. This number increased to 96% of patients 4 months after diagnosis. While most adolescents and young adults were satisfied with the amount of prognostic information they received, a sizable minority (19%–21%) desired additional information.[23][Level of evidence: II] A study of teens with advanced cancer suggested not only that they are capable of participating in complex decision making, but also that nearly all understand the consequences of their end-of-life (EOL) decisions and care about how they affect surviving friends and family.[24] Finally, a study of bereaved caregivers of adolescents and young adults cited delayed or absent communication about prognosis as a barrier to optimal EOL care.[25]

### Communication With Siblings

Siblings of children with cancer experience psychosocial distress during cancer therapy and after bereavement. In a study of 174 siblings of children who died of cancer, the siblings reported poor knowledge and experienced a lack of communication about the death of their brother or sister. Siblings who reported a lack of communication surrounding the death of their brother or sister reported higher levels of anxiety 2 to 9 years after the loss.[26] Of these 174 bereaved siblings, 108 participated in a survey in which 56% suggested that providers communicate better medical information. Other suggestions included giving parents more guidance on how to communicate with siblings and incorporate them into the care of the patient with cancer.[27] Similarly, a cross-sectional, survey-based study of bereaved siblings reported dissatisfaction with communication as a factor in higher distress scores.[28]

### Communication With a Child Whose Parent Has Cancer

A child whose parent has a diagnosis of advanced cancer experiences high levels of distress. A study of 28 families indicated that children wanted honest information from a variety of sources, including health professionals, and access to confidential conversations to avoid upsetting the ill parent.[29] In another study, 279 fathers widowed by cancer completed a survey about their own depression and bereavement symptoms, their wife’s illness, and EOL parental communication priorities. The study supports the importance of parental communication with children about death. Parents with terminal cancer identified illness-related communication with children as a source of concern, and many reported that they lacked the necessary confidence or information to effectively communicate with their children.[30]

### References

Field MJ, Behrman RE, eds.: When Children Die: Improving Palliative and End-of-Life Care for Children and Their Families. Institute of Medicine, National Academies Press, 2003. Also available online (https://www.nap.edu/read/10390/chapter/1). Last accessed January 20, 2022.
Epstein RM, Street RL Jr: Patient-Centered Communication in Cancer Care: Promoting Healing and Reducing Suffering. National Cancer Institute, 2007. NIH Pub. No. 07-6225. Also available online (https://cancercontrol.cancer.gov/sites/default/files/2020-06/pcc_monograph.pdf). Last accessed Feb. 7, 2024.
Mack JW, Wolfe J, Grier HE, et al.: Communication about prognosis between parents and physicians of children with cancer: parent preferences and the impact of prognostic information. J Clin Oncol 24 (33): 5265-70, 2006.17114660
Mack JW, Wolfe J, Cook EF, et al.: Hope and prognostic disclosure. J Clin Oncol 25 (35): 5636-42, 2007.18065734
Smith TJ, Dow LA, Virago E, et al.: Giving honest information to patients with advanced cancer maintains hope. Oncology (Williston Park) 24 (6): 521-5, 2010.20568593
Hagerty RG, Butow PN, Ellis PM, et al.: Communicating with realism and hope: incurable cancer patients' views on the disclosure of prognosis. J Clin Oncol 23 (6): 1278-88, 2005.15718326
Nyborn JA, Olcese M, Nickerson T, et al.: "Don't Try to Cover the Sky with Your Hands": Parents' Experiences with Prognosis Communication About Their Children with Advanced Cancer. J Palliat Med 19 (6): 626-31, 2016.27115314
Sisk BA, Kang TI, Mack JW: Prognostic disclosures over time: Parental preferences and physician practices. Cancer 123 (20): 4031-4038, 2017.28369836
Sisk BA, Kang TI, Mack JW: How Parents of Children With Cancer Learn About Their Children's Prognosis. Pediatrics 141 (1): , 2018.29208726
Ilowite MF, Cronin AM, Kang TI, et al.: Disparities in prognosis communication among parents of children with cancer: The impact of race and ethnicity. Cancer 123 (20): 3995-4003, 2017.28873224
Kodish E, Eder M, Noll RB, et al.: Communication of randomization in childhood leukemia trials. JAMA 291 (4): 470-5, 2004.14747504
Unguru Y, Sill AM, Kamani N: The experiences of children enrolled in pediatric oncology research: implications for assent. Pediatrics 125 (4): e876-83, 2010.20351001
Tulstrup M, Larsen HB, Castor A, et al.: Parents' and Adolescents' Preferences for Intensified or Reduced Treatment in Randomized Lymphoblastic Leukemia Trials. Pediatr Blood Cancer 63 (5): 865-71, 2016.26717887
Cousino MK, Zyzanski SJ, Yamokoski AD, et al.: Communicating and understanding the purpose of pediatric phase I cancer trials. J Clin Oncol 30 (35): 4367-72, 2012.23071225
Johnson LM, Leek AC, Drotar D, et al.: Practical communication guidance to improve phase 1 informed consent conversations and decision-making in pediatric oncology. Cancer 121 (14): 2439-48, 2015.25873253
Wangmo T, De Clercq E, Ruhe KM, et al.: Better to know than to imagine: Including children in their health care. AJOB Empir Bioeth 8 (1): 11-20, 2017 Jan-Mar.28949869
Beale EA, Baile WF, Aaron J: Silence is not golden: communicating with children dying from cancer. J Clin Oncol 23 (15): 3629-31, 2005.15908676
Panagiotaki G, Hopkins M, Nobes G, et al.: Children's and adults' understanding of death: Cognitive, parental, and experiential influences. J Exp Child Psychol 166: 96-115, 2018.28888195
Kenney AE, Bedoya SZ, Gerhardt CA, et al.: End of life communication among caregivers of children with cancer: A qualitative approach to understanding support desired by families. Palliat Support Care 19 (6): 715-722, 2021.33641691
Rosenberg AR, Wolfe J, Wiener L, et al.: Ethics, Emotions, and the Skills of Talking About Progressing Disease With Terminally Ill Adolescents: A Review. JAMA Pediatr 170 (12): 1216-1223, 2016.27749945
Lyon ME, McCabe MA, Patel KM, et al.: What do adolescents want? An exploratory study regarding end-of-life decision-making. J Adolesc Health 35 (6): 529.e1-6, 2004.15581537
Pao M, Mahoney MR: "Will You Remember Me?": Talking with Adolescents About Death and Dying. Child Adolesc Psychiatr Clin N Am 27 (4): 511-526, 2018.30219214
Sisk BA, Fasciano K, Block SD, et al.: Longitudinal prognostic communication needs of adolescents and young adults with cancer. Cancer 126 (2): 400-407, 2020.31568584
Hinds PS, Drew D, Oakes LL, et al.: End-of-life care preferences of pediatric patients with cancer. J Clin Oncol 23 (36): 9146-54, 2005.16172453
Mack JW, Currie ER, Martello V, et al.: Barriers to Optimal End-of-Life Care for Adolescents and Young Adults With Cancer: Bereaved Caregiver Perspectives. J Natl Compr Canc Netw 19 (5): 528-533, 2021.33571955
Lövgren M, Jalmsell L, Eilegård Wallin A, et al.: Siblings' experiences of their brother's or sister's cancer death: a nationwide follow-up 2-9 years later. Psychooncology 25 (4): 435-40, 2016.26260031
Lövgren M, Bylund-Grenklo T, Jalmsell L, et al.: Bereaved Siblings' Advice to Health Care Professionals Working With Children With Cancer and Their Families. J Pediatr Oncol Nurs 33 (4): 297-305, 2016.26669875
Rosenberg AR, Postier A, Osenga K, et al.: Long-term psychosocial outcomes among bereaved siblings of children with cancer. J Pain Symptom Manage 49 (1): 55-65, 2015.24880001
Kennedy VL, Lloyd-Williams M: Information and communication when a parent has advanced cancer. J Affect Disord 114 (1-3): 149-55, 2009.18684513
Park EM, Deal AM, Yopp JM, et al.: End-of-life parental communication priorities among bereaved fathers due to cancer. Patient Educ Couns 100 (5): 1019-1023, 2017.28012678

## Latest Updates to This Summary (02/07/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Communication Challenges in Oncology

Added text to state that oncologists’ own death anxiety may affect their confidence and comfort in discussing end-of-life topics (cited Harnischfeger et al. as reference 5).

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about communicating with the cancer patient and his or her family. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Communication in Cancer Care are:

- Katharine Brock, MD, MS (Children's Healthcare of Atlanta)
- Larry D. Cripe, MD (Indiana University School of Medicine)
- Natalie Jacobowski, MD (Nationwide Children's Hospital)
- Tammy I. Kang, MD, MSCE, FAAHPM (Texas Children's Pavilion for Women)
- Kristina B. Newport, MD, FAAHPM, HMDC (Penn State Hershey Cancer Institute at Milton S. Hershey Medical Center)
- Rachel A. Pozzar, PhD, RN (Dana-Farber Cancer Institute)
- Andrea Ruskin, MD (VA Connecticut Healthcare System)
- Joanna J. Sharpless, MD (University of California San Francisco)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Communication in Cancer Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/adjusting-to-cancer/communication-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389370]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).